# Penile Cancer Treatment (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of penile cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board.

## General Information About Penile Cancer

Key Points for This Section
- Penile cancer is a type of cancer that forms in the tissues of the penis.
- Human papillomavirus infection may increase the risk of developing penile cancer.
- Signs of penile cancer include sores, discharge, and bleeding.
- Tests that examine the penis are used to diagnose penile cancer.
- After penile cancer has been diagnosed, tests are done to find out if cancer cells have spread within the penis or to other parts of the body.
- Some people decide to get a second opinion.
- Certain factors affect prognosis (chance of recovery) and treatment options.

### Penile cancer is a type of cancer that forms in the tissues of the penis.

The penis is a rod-shaped male reproductive organ that passes sperm and urine from the body. It contains two types of erectile tissue (spongy tissue with blood vessels that fill with blood to make an erection):

- Corpora cavernosa are the two columns of erectile tissue that form most of the penis.
- Corpus spongiosum is the single column of erectile tissue that forms a small portion of the penis. The corpus spongiosum surrounds the urethra (the tube through which urine and sperm pass from the body).

The erectile tissue is wrapped in connective tissue and covered with skin. The glans (head of the penis) is covered with loose skin called the foreskin.

Anatomy of the penis. The parts of the penis are the base, shaft, glans, and foreskin. The tissues that make up the penis include the dorsal nerve, blood vessels, connective tissue, and erectile tissue (corpus cavernosum and corpus spongiosum). The urethra passes from the bladder to the tip of the penis.

Anatomy of the penis; drawing shows the base, shaft, glans, foreskin, and urethral opening. Also shown are the scrotum, prostate, pubic bone, and lymph nodes. An inset shows a cross section of the inside of the penis, including the blood vessels, dorsal nerve, connective tissue, erectile tissue (corpus cavernosum and corpus spongiosum), and urethra.

### Human papillomavirus infection may increase the risk of developing penile cancer.

Penile cancer is caused by certain changes to the penile cells function, especially how they grow and divide into new cells. There are many risk factors for penile cancer, but many do not directly cause cancer. Instead, they increase the chance of DNA damage in cells that may lead to penile cancer. To learn more about how cancer develops, see What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)

A risk factor is anything that increases the chance of getting a disease. Some risk factors for penile cancer, such as tobacco use, can be changed. However, risk factors also include things you cannot change, like getting older and your health history. Learning about risk factors for penile cancer can help you make changes that might lower your risk of getting it.

Risk factors for penile cancer include:

- being uncircumcised. Circumcision may help prevent infection with the human papillomavirus (HPV). A circumcision is an operation in which the doctor removes part or all of the foreskin from the penis. Many boys are circumcised shortly after birth. Men who were not circumcised at birth may have a higher risk of developing penile cancer. Learn more about HPV and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-fact-sheet).
- being 60 years or older.
- having phimosis (a condition in which the foreskin of the penis cannot be pulled back over the glans).
- having poor personal hygiene.
- having many sexual partners.
- using tobacco products. Learn more about Tobacco (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco) (includes help with quitting).

Having one or more of these risk factors does not mean that you will get penile cancer. Many people with risk factors never develop penile cancer, while others with no known risk factors do. Talk with your doctor if you think you may be at risk.

### Signs of penile cancer include sores, discharge, and bleeding.

These and other signs may be caused by penile cancer or by other conditions. Check with your doctor if you have:

- redness, irritation, or a sore on the penis
- a lump on the penis

### Tests that examine the penis are used to diagnose penile cancer.

In addition to asking about your personal and family health history and doing a physical exam, your doctor may perform the following tests and procedures:

- Physical exam of the penis is an exam in which the doctor checks the penis for signs of disease, such as lumps or anything else that seems unusual.
- Biopsy is the removal of cells or tissues so they can be viewed under a microscope by a pathologist to check for signs of cancer. The tissue sample is removed during one of the following procedures:
  - Incisional biopsy is the removal of part of a lump or a sample of tissue that doesn't look normal.
  - Excisional biopsy is the removal of an entire lump or area of tissue that doesn’t look normal.

### After penile cancer has been diagnosed, tests are done to find out if cancer cells have spread within the penis or to other parts of the body.

The process used to find out if cancer has spread within the penis or to other parts of the body is called staging. The information gathered from the staging process determines the stage of the disease. It is important to know the stage in order to plan treatment.

The following tests and procedures may be used in the staging process:

- CT scan (CAT scan) uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body, such as the pelvis. The pictures are taken from different angles and are used to create 3-D views of tissues and organs. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography.
- PET scan (positron emission tomography scan) uses a small amount of radioactive sugar (also called radioactive glucose) that is injected into a vein. The PET scanner rotates around the body and makes a picture of where the sugar is being used in the body. Cancer cells show up brighter in the picture because they are more active and take up more sugar than normal cells do. When this procedure is done at the same time as a CT scan, it is called a PET/CT scan.
- MRI (magnetic resonance imaging) uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body. A substance called gadolinium is injected into a vein. The gadolinium collects around the cancer cells so they show up brighter in the picture. This procedure is also called nuclear magnetic resonance imaging (NMRI).
- Ultrasound exam uses high-energy sound waves (ultrasound), which bounce off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram.
- Chest x-ray is a type of radiation that can go through the body and make pictures of the organs and bones inside the chest.
- Sentinel lymph node biopsy is the removal of the sentinel lymph node during surgery. The sentinel lymph node is the first lymph node in a group of lymph nodes to receive lymphatic drainage from the primary tumor. It is the first lymph node the cancer is likely to spread to from the primary tumor. A radioactive substance and/or blue dye is injected near the tumor. The substance or dye flows through the lymph ducts to the lymph nodes. The first lymph node to receive the substance or dye is removed. A pathologist views the tissue under a microscope to look for cancer cells. If cancer cells are not found, it may not be necessary to remove more lymph nodes. Sometimes, a sentinel lymph node is found in more than one group of nodes.
- Lymph node dissection is a procedure to remove one or more lymph nodes in the groin during surgery. A sample of tissue is checked under a microscope for signs of cancer. This procedure is also called a lymphadenectomy.

### Some people decide to get a second opinion.

You may want to get a second opinion to confirm your penile cancer diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the pathology report, slides, and scans. They may agree with the first doctor, suggest changes or another treatment approach, or provide more information about your cancer.

Learn more about choosing a doctor and getting a second opinion at Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). You can contact NCI’s Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor, hospital, or getting a second opinion. For questions you might want to ask at your appointments, visit Questions to Ask Your Doctor About Cancer (https://www.cancer.gov/about-cancer/coping/questions).

### Certain factors affect prognosis (chance of recovery) and treatment options.

The prognosis and treatment options depend on:

- the stage of the cancer
- the location and size of the tumor
- whether the cancer has just been diagnosed or has recurred (come back)

## Stages of Penile Cancer

Key Points for This Section
- The following stages are used for penile cancer:
  - Stage 0 (carcinoma in situ)
  - Stage I (also called stage 1) penile cancer
  - Stage II (also called stage 2) penile cancer
  - Stage III (also called stage 3) penile cancer
  - Stage IV (also called stage 4) penile cancer
- Penile cancer can recur (come back) after it has been treated.

Cancer stage describes the extent of cancer in the body, such as the size of the tumor, whether it has spread, and how far it has spread from where it first formed. It is important to know the stage of the penile cancer to plan the best treatment.

There are several staging systems for cancer that describe the extent of the cancer. Penile cancer staging usually uses the TNM staging system. The cancer may be described by this staging system in your pathology report. Based on the TNM results, a stage (I, II, III, or IV, also written as 1, 2, 3, or 4) is assigned to your cancer. When talking to you about your diagnosis, your doctor may describe the cancer as one of these stages.

Learn about tests to stage penile cancer. Learn more about Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging).

### The following stages are used for penile cancer:

#### Stage 0 (carcinoma in situ)

Stage 0 is divided into stages 0is and 0a.

- In stage 0is, abnormal cells are found on the surface of the skin of the penis. These abnormal cells form growths that may become cancer and spread into nearby normal tissue. Stage 0is is also called carcinoma in situ or penile intraepithelial neoplasia.
- In stage 0a, squamous cell cancer that does not spread is found on the surface of the skin of the penis or on the underneath surface of the foreskin of the penis. Stage 0a is also called noninvasive localized squamous cell carcinoma.

#### Stage I (also called stage 1) penile cancer

In stage I, cancer has formed and spread to tissue just under the skin of the penis. Cancer has not spread to lymph vessels, blood vessels, or nerves. The cancer cells look more like normal cells under a microscope.

#### Stage II (also called stage 2) penile cancer

Stage II is divided into stages IIA and IIB.

In stage IIA, cancer has spread:

- to tissue just under the skin of the penis. Cancer has spread to lymph vessels, blood vessels, and/or nerves; or
- to tissue just under the skin of the penis. Under a microscope, the cancer cells look very abnormal or the cells are sarcomatoid; or
- into the corpus spongiosum (spongy erectile tissue in the shaft and glans that fills with blood to make an erection).

In stage IIB, cancer has spread:

- through the layer of connective tissue that surrounds the corpus cavernosum and into the corpus cavernosum (spongy erectile tissue that runs along the shaft of the penis).

#### Stage III (also called stage 3) penile cancer

Stage III is divided into stages IIIA and stage IIIB. Cancer is found in the penis.

- In stage IIIA, cancer has spread to 1 or 2 lymph nodes on one side of the groin.
- In stage IIIB, cancer has spread to 3 or more lymph nodes on one side of the groin or to lymph nodes on both sides of the groin.

#### Stage IV (also called stage 4) penile cancer

In stage IV, cancer has spread:

- to tissues near the penis, such as the scrotum, prostate, or pubic bone, and may have spread to lymph nodes in the groin or pelvis; or
- to one or more lymph nodes in the pelvis, or cancer has spread through the outer covering of the lymph nodes to nearby tissue; or
- to lymph nodes outside the pelvis or to other parts of the body, such as the lung, liver, or bone.

Stage IV penile cancer is also called metastatic penile cancer. Metastatic cancer happens when cancer cells travel through the lymphatic system or blood and form tumors in other parts of the body. The metastatic tumor is the same type of cancer as the primary tumor. For example, if penile cancer spreads to the liver, the cancer cells in the liver are actually penile cancer cells. The disease is called metastatic penile cancer, not liver cancer. Learn more in Metastatic Cancer: When Cancer Spreads (https://www.cancer.gov/types/metastatic-cancer).

### Penile cancer can recur (come back) after it has been treated.

Recurrent penile cancer is cancer that has come back after it has been treated. If penile cancer comes back, it may come back in the penis or in other parts of the body, such as the liver or lungs. Tests will be done to help determine where the cancer has returned. The type of treatment for recurrent penile cancer will depend on where it has come back.

Learn more in Recurrent Cancer: When Cancer Comes Back (https://www.cancer.gov/types/recurrent-cancer). Information to help you cope and talk with your health care team can be found in the booklet When Cancer Returns (https://www.cancer.gov/publications/patient-education/when-cancer-returns).

## Treatment Option Overview

Key Points for This Section
- There are different types of treatment for people with penile cancer.
- The following types of treatment are used:
  - Surgery
  - Radiation therapy
  - Chemotherapy
  - Immunotherapy
- New types of treatment are being tested in clinical trials.
- Treatment for penile cancer may cause side effects.
- Follow-up care may be needed.

### There are different types of treatment for people with penile cancer.

Different types of treatments are available for penile cancer. You and your cancer care team will work together to decide your treatment plan, which may include more than one type of treatment. Many factors will be considered, such as the stage of the cancer, your overall health, and your preferences. Your plan will include information about your cancer, the goals of treatment, your treatment options and the possible side effects, and the expected length of treatment.

Talking with your cancer care team before treatment begins about what to expect will be helpful. You’ll want to learn what you need to do before treatment begins, how you’ll feel while going through it, and what kind of help you will need. To learn more, visit Questions to Ask Your Doctor About Treatment (https://www.cancer.gov/about-cancer/treatment/questions).

### The following types of treatment are used:

#### Surgery

Surgery is the most common treatment for all stages of penile cancer. A doctor may remove the cancer using one of the following operations:

- Mohs microsurgery: A procedure in which the tumor is cut from the skin in thin layers. During the surgery, the edges of the tumor and each layer of tumor removed are viewed through a microscope to check for cancer cells. Layers continue to be removed until no more cancer cells are seen. This type of surgery removes as little normal tissue as possible and is often used to remove cancer on the skin. It is also called Mohs surgery.
  Mohs surgery. A surgical procedure to remove a visible lesion on the skin in several steps. First, a thin layer of cancerous tissue is removed. Then, a second thin layer of tissue is removed and viewed under a microscope to check for cancer cells. More layers are removed one at a time until the tissue viewed under a microscope shows no remaining cancer. This type of surgery is used to remove as little normal tissue as possible.
  Mohs surgery; drawing shows a visible lesion on the skin. The pullout shows a block of skin with cancer in the epidermis (outer layer of the skin) and the dermis (inner layer of the skin). A visible lesion is shown on the skin’s surface. Four numbered blocks show the removal of thin layers of the skin one at a time until all the cancer is removed.
- Laser surgery: A surgical procedure that uses a laser beam (a narrow beam of intense light) as a knife to make bloodless cuts in tissue or to remove a surface lesion such as a tumor. Learn more about Lasers to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/surgery/lasers).
- Cryosurgery: A treatment that uses an instrument to freeze and destroy abnormal tissue. This type of treatment is also called cryotherapy. Learn more about Cryosurgery to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/surgery/cryosurgery).
- Circumcision: Surgery to remove part or all of the foreskin of the penis.
- Wide local excision: Surgery to remove only the cancer and some normal tissue around it.
- Amputation of the penis: Surgery to remove part or all of the penis. If part of the penis is removed, it is a partial penectomy. If all of the penis is removed, it is a total penectomy.

Lymph nodes in the groin may be taken out during surgery.

After the doctor removes all the cancer that can be seen at the time of the surgery, some patients may be given chemotherapy or radiation therapy after surgery to kill any cancer cells that are left. Treatment given after the surgery, to lower the risk that the cancer will come back, is called adjuvant therapy.

#### Radiation therapy

Radiation therapy is a cancer treatment that uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. There are two types of radiation therapy used to treat penile cancer:

- External radiation therapy uses a machine outside the body to send radiation toward the area of the body with cancer.
- Internal radiation therapy uses a radioactive substance sealed in needles, seeds, wires, or catheters that are placed directly into or near the cancer.

Learn more about Radiation Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy) and Radiation Therapy Side Effects (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/side-effects).

#### Chemotherapy

Chemotherapy (also called chemo) uses drugs to stop the growth of cancer cells, either by killing the cells or by stopping them from dividing.

Topical chemotherapy is placed directly onto the skin, where it mainly affects cancer cells in those areas. Topical chemotherapy, such as fluorouracil (https://www.cancer.gov/about-cancer/treatment/drugs/fluorouracil-topical) may be used to treat stage 0 penile cancer.

Systemic chemotherapy is when chemotherapy drugs are taken by mouth or injected into a vein or muscle. When given this way, the drugs enter the bloodstream and can reach cancer cells throughout the body. Systemic chemotherapy may be used if the cancer is too large to be removed by surgery or has spread to the lymph nodes or other parts of the body.

Learn more about how chemotherapy works, how it is given, common side effects, and more at Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy) and Chemotherapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/chemo-and-you).

#### Immunotherapy

Immunotherapy helps a person’s immune system fight cancer.

Topical imiquimod is an immunotherapy drug used to treat penile cancer.

Learn more about Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy).

### New types of treatment are being tested in clinical trials.

For some people, joining a clinical trial may be an option. There are different types of clinical trials for people with cancer. For example, a treatment trial tests new treatments or new ways of using current treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials accepting participants. The search allows you to filter trials based on the type of cancer, your age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials, including how to find and join one, at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

### Treatment for penile cancer may cause side effects.

For information about side effects caused by treatment for cancer, visit our Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects) page.

### Follow-up care may be needed.

As you go through treatment, you will have follow-up tests or check-ups. Some tests that were done to diagnose or stage the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your condition has changed or if the cancer has recurred (come back).

## Treatment of Stage 0

Treatment of stage 0 may include:

- Mohs microsurgery
- topical chemotherapy
- topical immunotherapy with imiquimod
- laser surgery
- cryosurgery

Learn more about these treatments in the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Stage I Penile Cancer

If the cancer is only in the foreskin, wide local excision and circumcision may be the only treatment needed.

Treatment of stage I penile cancer may also include:

- surgery (partial or total penectomy with or without removal of lymph nodes in the groin)
- external or internal radiation therapy
- Mohs microsurgery

Learn more about these treatments in the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Stage II Penile Cancer

Treatment of stage II penile cancer may include:

- surgery (partial or total penectomy, with or without removal of lymph nodes in the groin)
- external or internal radiation therapy followed by surgery

Learn more about these treatments in the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Stage III Penile Cancer

Treatment of stage III penile cancer may include:

- surgery (penectomy and removal of lymph nodes in the groin) with or without radiation therapy
- radiation therapy

Learn more about these treatments in the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Stage IV Penile Cancer

Treatment of stage IV penile cancer is usually palliative (to relieve symptoms and improve the quality of life). Treatment may include:

- surgery (wide local excision and removal of lymph nodes in the groin)
- radiation therapy

Learn more about these treatments in the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Recurrent Penile Cancer

Treatment of recurrent penile cancer may include:

- surgery (penectomy)
- radiation therapy

Learn more about these treatments in the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## To Learn More About Penile Cancer

For more information from the National Cancer Institute about penile cancer, visit:

- Penile Cancer Home Page (https://www.cancer.gov/types/penile/)
- Drugs Approved for Penile Cancer (https://www.cancer.gov/about-cancer/treatment/drugs/penile)

For general cancer information and other resources from the National Cancer Institute, visit:

- About Cancer (https://www.cancer.gov/about-cancer)
- Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
- Chemotherapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/chemo-and-you)
- Radiation Therapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/radiation-therapy-and-you)
- Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
- Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of penile cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Penile Cancer Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/penile/patient/penile-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389255]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).